# Intraocular (Uveal) Melanoma Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of intraocular melanoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Intraocular (Uveal) Melanoma Treatment

### Incidence and Mortality

Melanoma of the uveal tract (iris, ciliary body, and choroid) is rare, but it is the most common primary intraocular malignancy in adults. The mean age-adjusted incidence of uveal melanoma in the United States is approximately 4.3 new cases per million people, with no clear variation by latitude. The incidence is higher in men (4.9 cases per million) than in women (3.7 cases per million).[1] The age-adjusted incidence of this cancer has remained stable since at least the early 1970s.[1,2] U.S. incidence rates are lower than the rates of other reporting countries, which vary from about 5.3 to 10.9 cases per million. Some of the variation may be the result of differences in inclusion criteria and methods of calculation.[1]

Uveal melanoma is most often diagnosed in older individuals, with a progressively rising, age-specific incidence rate that peaks near age 70 years.[3]

Host susceptibility factors associated with the development of this cancer include:[2-4]

- White race and ethnicity.
- Light eye color.
- Fair skin.
- The ability to tan.

In view of these susceptibility factors, numerous observational studies have attempted to explore the relationship between sunlight exposure and risk of uveal melanoma. These studies have found only weak associations or yielded contradictory results.[3] Similarly, there is no consistent evidence that occupational exposure to UV light or other agents is a risk factor for uveal melanoma.[3,5]

### Anatomy

Uveal melanomas can arise in the anterior (iris) or the posterior (ciliary body or choroid) uveal tract.[6] Most uveal tract melanomas originate in the choroid. The ciliary body is a less common site of origin, and the iris is the least common. The comparatively low incidence of iris melanomas has been attributed to the characteristic features of these tumors; they tend to be smaller, slower growing, and relatively dormant compared with their posterior counterparts. Iris melanomas rarely metastasize.[7] Melanomas of the posterior uveal tract generally have a more malignant histological appearance; are detected later; and metastasize more frequently than iris melanomas. The typical choroidal melanoma is a brown, elevated, dome-shaped subretinal mass. The degree of pigmentation ranges from dark brown to totally amelanotic.

Most uveal melanomas are initially completely asymptomatic. As the tumor enlarges, it may cause distortion of the pupil (iris melanoma), blurred vision (ciliary body melanoma), or markedly decreased visual acuity caused by secondary retinal detachment (choroidal melanoma). Serous detachment of the retina may occur. If extensive detachment occurs, secondary angle-closure glaucoma occasionally develops. Clinically, several lesions simulate uveal melanoma, including metastatic carcinoma, posterior scleritis, and benign tumors, such as nevi and hemangiomas.[8]

Anatomy of the eye.

Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.

### Diagnosis

Careful examination by an experienced clinician remains the most important test to diagnose intraocular melanoma. A small uveal melanoma cannot be distinguished from a nevus. Small uveal lesions are observed for growth before making a diagnosis of melanoma. Clinical findings that may help to identify melanoma include:[6]

- Orange pigment on the tumor surface.
- Subretinal fluid.
- Tumor thickness of more than 2 mm.
- Low internal reflectivity on ultrasound examination.

Ancillary diagnostic testing, including fluorescein angiography and ultrasonography, can be extremely valuable in establishing and confirming the diagnosis.[9] In a large, retrospective, single-center series of 2,514 consecutive patients with choroidal nevi, the progression rate to melanoma was 8.6% at 5 years, 12.8% at 10 years, and 17.3% at 15 years.[10]

### Prognostic Factors

Several factors influence prognosis. The most important factors include:

- Cell type. For more information, see the Cellular Classification of Intraocular (Uveal) Melanoma section.
- Tumor size.
- Location of the anterior margin of the tumor.
- Degree of ciliary body involvement.
- Extraocular extension.

Several additional microscopic features can affect the prognosis of intraocular melanoma, including:

- Mitotic activity.
- Lymphocytic infiltration.
- Fibrovascular loops (possibly).

Cell type is the most commonly used predictor of outcome following enucleation. Patients with spindle-A cell melanomas have the best prognosis and patients with epithelioid cell melanomas have the least favorable prognosis.[1,4,9] Nevertheless, most tumors have an admixture of cell types, and there is no clear consensus regarding the proportion of epithelioid cells that constitutes designation of a tumor as mixed or epithelioid.[6]

Extraocular extension, recurrence, and metastasis are associated with an extremely poor prognosis, and long-term survival cannot be expected for patients with these features.[11] The 5-year mortality rate for patients with metastasis from ciliary body or choroidal melanoma is approximately 30%, compared with a rate of 2% to 3% for patients with iris melanomas.[12]

### References

Singh AD, Topham A: Incidence of uveal melanoma in the United States: 1973-1997. Ophthalmology 110 (5): 956-61, 2003.12750097 22635800
Inskip PD, Devesa SS, Fraumeni JF: Trends in the incidence of ocular melanoma in the United States, 1974-1998. Cancer Causes Control 14 (3): 251-7, 2003.12814204
Singh AD, Bergman L, Seregard S: Uveal melanoma: epidemiologic aspects. Ophthalmol Clin North Am 18 (1): 75-84, viii, 2005.15763193
Weis E, Shah CP, Lajous M, et al.: The association between host susceptibility factors and uveal melanoma: a meta-analysis. Arch Ophthalmol 124 (1): 54-60, 2006.16401785
Harris RB, Griffith K, Moon TE: Trends in the incidence of nonmelanoma skin cancers in southeastern Arizona, 1985-1996. J Am Acad Dermatol 45 (4): 528-36, 2001.11568742
Uveal melanoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 805–17.
Yap-Veloso MI, Simmons RB, Simmons RJ: Iris melanomas: diagnosis and management. Int Ophthalmol Clin 37 (4): 87-100, 1997 Fall.9429934 98091769
Eye and ocular adnexa. In: Rosai J: Ackerman’s Surgical Pathology. 8th ed. Mosby, 1996, pp 2449-2508.
Albert DM, Kulkarni AD: Intraocular melanoma. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 2090-8.
Shields CL, Furuta M, Berman EL, et al.: Choroidal nevus transformation into melanoma: analysis of 2514 consecutive cases. Arch Ophthalmol 127 (8): 981-7, 2009.19667334
Gragoudas ES, Egan KM, Seddon JM, et al.: Survival of patients with metastases from uveal melanoma. Ophthalmology 98 (3): 383-9; discussion 390, 1991.2023760 91219142
Introduction to melanocytic tumors of the uvea. In: Shields JA, Shields CL: Intraocular Tumors: A Text and Atlas. Saunders, 1992, pp 45-59.

## Cellular Classification of Intraocular (Uveal) Melanoma

Primary intraocular melanomas originate from melanocytes in the uveal tract.[1] The following four distinct cellular types are recognized in intraocular melanoma (revised Callender classification):[2]

1. Spindle-A cells (spindle-shaped cells with slender nuclei and lacking visible nucleoli).
2. Spindle-B cells (spindle-shaped cells with larger nuclei and distinct nucleoli).
3. Epithelioid cells (larger polygonal cells with one or more prominent nucleoli).
4. Intermediate cells (similar to but smaller than epithelioid cells).

Most primary intraocular melanomas contain variable proportions of epithelioid, spindle-A, and spindle-B cells (mixed-cell melanomas). Pure epithelioid-cell primary melanomas are infrequent (approximately 3% of cases).[1] In the Collaborative Ocular Melanoma Study, mixed-cell melanomas predominated (86% of cases).[3]

### References

Klintworth GK, Scroggs MW: The eye and ocular adnexa. In: Sternberg SS, ed.: Diagnostic Surgical Pathology. Lippincott Williams & Wilkins, 1999, pp 994-6.
Grossniklaus HE, Green WR: Uveal tumors. In: Garner A, Klintworth GK, eds.: Pathobiology of Ocular Disease: A Dynamic Approach. 2nd ed. M. Dekker, 1994, pp 1423-77.
Histopathologic characteristics of uveal melanomas in eyes enucleated from the Collaborative Ocular Melanoma Study. COMS report no. 6. Am J Ophthalmol 125 (6): 745-66, 1998.9645714 98307646

## Classification and Stage Information for Intraocular (Uveal) Melanoma

### Tumor Size

Uveal melanoma most often assumes a nodular or dome-shaped configuration. Occasionally, tumors are flat or diffuse and involve extensive areas of the uvea with little elevation.

Tumor size classifications according to boundary lines used in a Collaborative Ocular Melanoma Study (COMS) are as follows:[1]

1. Small: Range from 1.0 to 3.0 mm in apical height and largest basal diameter of 5.0 to 16.0 mm.[1]
2. Medium: Range from 3.1 to 8.0 mm in apical height and a basal diameter of not more than 16.0 mm.[2]
3. Large: Greater than 8.0 mm in apical height or a basal diameter more than 16.0 mm, when the apical height is at least 2.0 mm.

Although most ocular melanomas have a raised configuration, about 5% grow in a diffuse pattern that also may have prognostic significance. The tumors have a horizontal, flat-growth pattern, with the thickness measuring approximately 20% or less than the greatest basal dimension. This uncommon variant of uveal melanoma seems to be associated with a poorer prognosis, particularly when the diameter is large and the margins are poorly defined.[3]

In clinical practice, the tumor base may be estimated in average optic disc diameters (1 dd = 1.5 mm). The average elevation may be estimated in diopters (3 diopters = 1 mm). Other techniques, such as ultrasonography, are used to provide more accurate measurements.

An important function of ophthalmic ultrasonography is the detection of extrascleral extension.[4,5] Extrascleral extension measuring 2 mm or more in thickness can be demonstrated, provided it is located behind the equator where the intraocular tumor, sclera, and adjacent orbital fat are readily imaged.[6] Orbital extraocular extension of choroidal melanoma may be found in eyes with medium and large tumors, but it is very rare in eyes with small melanomas.

### Metastatic Disease

Systemic metastases are evident in only 2% to 3% of patients at the time of diagnosis of the primary ocular melanoma.[7] Because the uveal tract is a vascular structure without lymphatic channels, tumor spread occurs principally by local extension and by dissemination through the bloodstream.[7] Lymphatic spread is rare but may occur after local extension into the conjunctiva and its lymphatics.[8] Given the rarity of nodal metastases, sentinel node biopsies of nonclinically involved nodes are not done as part of the staging procedure.[7]

Systemic metastases are generally hematogenous in origin, and the first site identified is usually the liver.[9] Lung, bone, and subcutaneous sites are also common.[9] In the COMS trials, the liver was the only site of detectable metastasis in 46% of patients with metastases reported during follow-up or at the time of death; 43% had metastases diagnosed in the liver and other sites.[9] In patients with a history of ocular melanoma who present with hepatic metastases of unknown origin, metastatic melanoma is considered in the differential diagnosis.

It is particularly unusual for choroidal melanomas of any size to invade the optic nerve or its meninges.[10] Metastasis of choroidal melanoma to the contralateral choroid is also rare.[9,11]

### Staging

#### American Joint Committee on Cancer (AJCC) stage groupings and definitions of TNM

The AJCC has designated staging by TNM (tumor, node, metastasis) classification to define melanoma of the uveal tract.[7]

As in the seventh edition of the AJCC Cancer Staging Manual, there is no staging system for iris melanomas in the eighth edition. However, TNM should still be recorded for this site and histology combination.

Table 1. Definition of Primary Tumor (T) for Iris Melanomas^a,b^

T Category | T Criteria
TX | Primary tumor cannot be assessed.
T0 | No evidence of primary tumor.
T1 | Tumor limited to the iris.
–T1a | Tumor limited to the iris, not more than 3 clock hours in size.
–T1b | Tumor limited to the iris, more than 3 clock hours in size.
–T1c | Tumor limited to the iris with secondary glaucoma.
T2 | Tumor confluent with or extending into the ciliary body, choroid, or both.
–T2a | Tumor confluent with or extending into the ciliary body, without secondary glaucoma.
–T2b | Tumor confluent with or extending into the ciliary body and choroid, without secondary glaucoma.
–T2c | Tumor confluent with or extending into the ciliary body, choroid, or both, with secondary glaucoma.
T3 | Tumor confluent with or extending into the ciliary body, choroid, or both, with scleral extension.
T4 | Tumor with extrascleral extension.
–T4a | Tumor with extrascleral extension ≤5 mm in largest diameter.
–T4b | Tumor with extrascleral extension >5 mm in largest diameter.

^a^Reprinted with permission from AJCC: Uveal melanoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 805–17.

^b^Iris melanomas originate from, and are predominantly located in, this region of the uvea. If less than half the tumor volume is located within the iris, the tumor may have originated in the ciliary body, and consideration should be given to classifying it accordingly.

Table 2. Definition of Regional Lymph Node (N)^a^

N Category | N Criteria
NX | Regional lymph nodes cannot be assessed.
N0 | No regional lymph node involvement.
N1 | Regional lymph node metastases or discrete tumor deposits in the orbit.
–N1a | Metastasis in one or more regional lymph node(s).
–N1b | No regional lymph nodes are positive, but there are discrete tumor deposits in the orbit that are not contiguous to the eye (choroidal and ciliary body).

^a^Reprinted with permission from AJCC: Uveal melanoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 805–17.

Table 3. Definition of Distant Metastasis (M)^a^

M Category | M Criteria
M0 | No distant metastasis by clinical classification.
M1 | Distant metastasis.
–M1a | Largest diameter of the largest metastasis ≤3.0 cm.
–M1b | Largest diameter of the largest metastasis 3.1–8.0 cm.
–M1c | Largest diameter of the largest metastasis ≥8.1 cm.

^a^Reprinted with permission from AJCC: Uveal melanoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 805–17.

Table 4. Classification of Ciliary Body and Choroid Uveal Melanoma Based on Thickness and Diameter^a^

Category | Tumor Size
1 | Tumor is ≤12 mm in diameter and ≤3 mm in thickness; or
1 | Tumor is ≤9 mm in diameter and 3.1–6 mm in thickness.
2 | Tumor is 12.1–18 mm in diameter and ≤3 mm in thickness; or
2 | Tumor is 9.1–15 mm in diameter and 3.1– 6 mm in thickness; or
2 | Tumor is ≤12 mm in diameter and 6.1–9 mm in thickness.
3 | Tumor is 15.1–18 mm in diameter and 3.1–6 mm in thickness; or
3 | Tumor is 12.1–18 mm in diameter and 6.1–9 mm in thickness; or
3 | Tumor is ≤18 mm in diameter and 9.1–12 mm in thickness; or
3 | Tumor is ≤15 mm in diameter and 12.1–15 mm in thickness.
4 | Tumor is >18 mm in diameter and may be any thickness; or
4 | Tumor is 15.1–18 mm in diameter and >12 mm in thickness; or
4 | Tumor is ≤15 mm in diameter and >15 mm in thickness.

^a^Adapted from AJCC: Uveal melanoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 805–17.

Table 5. Definition of TNM Stage I Choroidal and Ciliary Body Melanomas^a,b^

Stage | TNM | Description
I | T1a, N0, M0 | –T1a = Tumor size category 1 without ciliary body involvement and extraocular extension.
I | T1a, N0, M0 | N0 = No regional lymph node involvement.
I | T1a, N0, M0 | M0 = No distant metastasis by clinical classification.

M = distant metastasis; N = regional lymph node; T = primary tumor.

^a^Reprinted with permission from AJCC: Uveal melanoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 805–17.

^b^1) Primary ciliary body and choroidal melanomas are classified according to four tumor-size categories based on thickness and diameter. See Table 4. 2) In clinical practice, the largest tumor basal diameter may be estimated in optic disc diameters (DD) (average: 1 DD = 1.5 mm), and tumor thickness may be estimated in diopters (average: 2.5 diopters = 1 mm). Ultrasonography and fundus photography are used to provide more accurate measurements. 3) When histopathological measurements are recorded after fixation, tumor diameter and thickness may be underestimated because of tissue shrinkage.

Table 6. Definition of TNM Stages IIA and IIB Choroidal and Ciliary Body Melanomas^a,b^

Stage | TNM | Description
IIA | T1b–d, N0, M0 | –T1b = Tumor size category 1 with ciliary body involvement.
IIA | T1b–d, N0, M0 | –T1c = Tumor size category 1 without ciliary body involvement but with extraocular extension ≤5 mm in largest diameter.
IIA | T1b–d, N0, M0 | –T1d = Tumor size category 1 with ciliary body involvement and extraocular extension ≤5 mm in largest diameter.
IIA | T1b–d, N0, M0 | N0 = No regional lymph node involvement.
IIA | T1b–d, N0, M0 | M0 = No distant metastasis by clinical classification.
IIA | T2a, N0, M0 | –T2a = Tumor size category 2 without ciliary body involvement and extraocular extension.
IIA | T2a, N0, M0 | N0 = No regional lymph node involvement.
IIA | T2a, N0, M0 | M0 = No distant metastasis by clinical classification.
IIB | T2b, N0, M0 | –T2b = Tumor size category 2 with ciliary body involvement.
IIB | T2b, N0, M0 | N0 = No regional lymph node involvement.
IIB | T2b, N0, M0 | M0 = No distant metastasis by clinical classification.
IIB | T3a, N0, M0 | –T3a = Tumor size category 3 without ciliary body involvement and extraocular extension.
IIB | T3a, N0, M0 | N0 = No regional lymph node involvement.
IIB | T3a, N0, M0 | M0 = No distant metastasis by clinical classification.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Uveal melanoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 805–17.

^b^1) Primary ciliary body and choroidal melanomas are classified according to four tumor-size categories based on thickness and diameter. See Table 4. 2) In clinical practice, the largest tumor basal diameter may be estimated in optic disc diameters (DD) (average: 1 DD = 1.5 mm), and tumor thickness may be estimated in diopters (average: 2.5 diopters = 1 mm). Ultrasonography and fundus photography are used to provide more accurate measurements. 3) When histopathological measurements are recorded after fixation, tumor diameter and thickness may be underestimated because of tissue shrinkage.

Table 7. Definition of TNM Stages IIIA, IIIB, and IIIC Choroidal and Ciliary Body Melanomas^a,b^

Stage | TNM | Description
IIIA | T2c–d, N0, M0 | –T2c = Tumor size category 2 without ciliary body involvement but with extraocular extension ≤5 mm in largest diameter.
IIIA | T2c–d, N0, M0 | –T2d = Tumor size category 2 with ciliary body involvement and extraocular extension ≤5 mm in largest diameter.
IIIA | T2c–d, N0, M0 | N0 = No regional lymph node involvement.
IIIA | T2c–d, N0, M0 | M0 = No distant metastasis by clinical classification.
IIIA | T3b–c, N0, M0 | –T3b = Tumor size category 3 with ciliary body involvement.
IIIA | T3b–c, N0, M0 | –T3c = Tumor size category 3 without ciliary body involvement but with extraocular extension ≤5 mm in largest diameter.
IIIA | T3b–c, N0, M0 | N0 = No regional lymph node involvement.
IIIA | T3b–c, N0, M0 | M0 = No distant metastasis by clinical classification.
IIIA | T4a, N0, M0 | –T4a = Tumor size category 4 without ciliary body involvement and extraocular extension.
IIIA | T4a, N0, M0 | N0 = No regional lymph node involvement.
IIIA | T4a, N0, M0 | M0 = No distant metastasis by clinical classification.
IIIB | T3d, N0, M0 | –T3d = Tumor size category 3 with ciliary body involvement and extraocular extension ≤5 mm in largest diameter.
IIIB | T3d, N0, M0 | N0 = No regional lymph node involvement.
IIIB | T3d, N0, M0 | M0 = No distant metastasis by clinical classification.
IIIB | T4b–c, N0, M0 | –T4b = Tumor size category 4 with ciliary body involvement.
IIIB | T4b–c, N0, M0 | –T4c = Tumor size category 4 without ciliary body involvement but with extraocular extension ≤5 mm in largest diameter.
IIIB | T4b–c, N0, M0 | N0 = No regional lymph node involvement.
IIIB | T4b–c, N0, M0 | M0 = No distant metastasis by clinical classification.
IIIC | T4d–e, N0, M0 | –T4d = Tumor size category 4 with ciliary body involvement and extraocular extension ≤5 mm in largest diameter.
IIIC | T4d–e, N0, M0 | –T4e = Any tumor size category with extraocular extension >5 mm in largest diameter.
IIIC | T4d–e, N0, M0 | N0 = No regional lymph node involvement.
IIIC | T4d–e, N0, M0 | M0 = No distant metastasis by clinical classification.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Uveal melanoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 805–17.

^b^1) Primary ciliary body and choroidal melanomas are classified according to four tumor-size categories based on thickness and diameter. See Table 4. 2) In clinical practice, the largest tumor basal diameter may be estimated in optic disc diameters (DD) (average: 1 DD = 1.5 mm), and tumor thickness may be estimated in diopters (average: 2.5 diopters = 1 mm). Ultrasonography and fundus photography are used to provide more accurate measurements. 3) When histopathological measurements are recorded after fixation, tumor diameter and thickness may be underestimated because of tissue shrinkage.

Table 8. Definition of TNM Stage IV Choroidal and Ciliary Body Melanomas^a,b^

Stage | TNM | Description
IV | Any T, N1, M0 | TX = Primary tumor cannot be assessed.
IV | Any T, N1, M0 | T0 = No evidence of primary tumor.
IV | Any T, N1, M0 | T1 = Tumor size category 1.
IV | Any T, N1, M0 | –T1a = Tumor size category 1 without ciliary body involvement and extraocular extension.
IV | Any T, N1, M0 | –T1b = Tumor size category 1 with ciliary body involvement.
IV | Any T, N1, M0 | –T1c = Tumor size category 1 without ciliary body involvement but with extraocular extension ≤5 mm in largest diameter.
IV | Any T, N1, M0 | –T1d = Tumor size category 1 with ciliary body involvement and extraocular extension ≤5 mm in largest diameter.
IV | Any T, N1, M0 | T2 = Tumor size category 2.
IV | Any T, N1, M0 | –T2a = Tumor size category 2 without ciliary body involvement and extraocular extension.
IV | Any T, N1, M0 | –T2b = Tumor size category 2 with ciliary body involvement.
IV | Any T, N1, M0 | –T2c = Tumor size category 2 without ciliary body involvement but with extraocular extension ≤5 mm in largest diameter.
IV | Any T, N1, M0 | –T2d = Tumor size category 2 with ciliary body involvement and extraocular extension ≤5 mm in largest diameter.
IV | Any T, N1, M0 | T3 = Tumor size category 3.
IV | Any T, N1, M0 | –T3a = Tumor size category 3 without ciliary body involvement and extraocular extension.
IV | Any T, N1, M0 | –T3b = Tumor size category 3 with ciliary body involvement.
IV | Any T, N1, M0 | –T3c = Tumor size category 3 without ciliary body involvement but with extraocular extension ≤5 mm in largest diameter.
IV | Any T, N1, M0 | –T3d = Tumor size category 3 with ciliary body involvement and extraocular extension ≤5 mm in largest diameter.
IV | Any T, N1, M0 | T4 = Tumor size category 4.
IV | Any T, N1, M0 | –T4a = Tumor size category 4 without ciliary body involvement and extraocular extension.
IV | Any T, N1, M0 | –T4b = Tumor size category 4 with ciliary body involvement.
IV | Any T, N1, M0 | –T4c = Tumor size category 4 without ciliary body involvement but with extraocular extension ≤5 mm in largest diameter.
IV | Any T, N1, M0 | –T4d = Tumor size category 4 with ciliary body involvement and extraocular extension ≤5 mm in largest diameter.
IV | Any T, N1, M0 | –T4e = Any tumor size category with extraocular extension >5 mm in largest diameter.
IV | Any T, N1, M0 | N1 = Regional lymph node metastases or discrete tumor deposits in the orbit.
IV | Any T, N1, M0 | –N1a = Metastasis in one or more regional lymph nodes(s).
IV | Any T, N1, M0 | –N1b = No regional lymph nodes are positive, but there are discrete tumor deposits in the orbit that are not contiguous to the eye.
IV | Any T, N1, M0 | M0 = No distant metastasis by clinical classification.
IV | Any T, Any N, M1a–c | Any T = See descriptions above in this table, stage IV, Any T, N1, M0.
IV | Any T, Any N, M1a–c | NX = Regional lymph nodes cannot be assessed.
IV | Any T, Any N, M1a–c | N0 = No regional lymph node involvement.
IV | Any T, Any N, M1a–c | N1 = Regional lymph node metastases or discrete tumor deposits in the orbit.
IV | Any T, Any N, M1a–c | –N1a = Metastasis in one or more regional lymph node(s).
IV | Any T, Any N, M1a–c | –N1b = No regional lymph nodes are positive, but there are discrete tumor deposits in the orbit that are not contiguous to the eye (choroidal and ciliary body).
IV | Any T, Any N, M1a–c | M1 = Distant metastasis.
IV | Any T, Any N, M1a–c | –M1a = Largest diameter of the largest metastasis ≤3.0 cm.
IV | Any T, Any N, M1a–c | –M1b = Largest diameter of the largest metastasis 3.1–8.0 cm.
IV | Any T, Any N, M1a–c | –M1c = Largest diameter of the largest metastasis ≥8.1 cm.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Uveal melanoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 805–17.

^b^1) Primary ciliary body and choroidal melanomas are classified according to four tumor-size categories based on thickness and diameter. See Table 4. 2) In clinical practice, the largest tumor basal diameter may be estimated in optic disc diameters (DD) (average: 1 DD = 1.5 mm), and tumor thickness may be estimated in diopters (average: 2.5 diopters = 1 mm). Ultrasonography and fundus photography are used to provide more accurate measurements. 3) When histopathological measurements are recorded after fixation, tumor diameter and thickness may be underestimated because of tissue shrinkage.

#### Prognostic features

There are several key prognostic features that are important to collect in malignant melanoma of the uvea, even though they are not included in staging algorithms. These include:[7]

##### Molecular features

1. Chromosomal alterations.
  a. Chromosome 3 status (loss or no loss, complete or partial).
  b. Chromosome 6p status (gain or no gain).
  c. Chromosome 8q status (gain or no gain).
    Indicate:
    - Technique used for assessing chromosome status may include:
      - Karyotyping.
      - Fluorescence in situ hybridization.
      - Comparative genomic hybridization.
      - Loss of heterozygosity using DNA polymorphism analysis (e.g., single nucleotide polymorphism, microsatellite).
      - Other.
    - How specimen was obtained may include:
      - Enucleation.
      - Local resection.
      - Biopsy.
      - Fine-needle aspiration biopsy.
    - For needle biopsies, whether cytopathological evaluation was performed to confirm the presence of tumor cells.
2. Gene-expression profile: class 1 or class 2.
  Indicate:
  a. Technique used for gene-expression profiling may include:
    - Microarray.
    - Pathological complete response.
  b. How specimen was obtained may include:
    - Enucleation.
    - Local resection.
    - Biopsy.
    - Fine-needle aspiration biopsy.
  c. For needle biopsies, whether cytopathological evaluation was performed to confirm the presence of tumor cells.

##### Clinical and histopathological features

1. Clinical.
  a. Positron emission tomography/computed tomography.
    - Fluorine F 18-fludeoxyglucose standardized uptake values (higher values in primary tumor may be associated with shorter survival).
  b. Confocal indocyanine green angiography.
    - Identification of complex monocirculatory patterns (i.e., loops, networks, arcs with branching, parallel with cross-linking or a combination of these patterns may be associated with shorter survival).
2. Histopathological.
  a. Mitotic count.
    - Number of mitotic figures per 40 high-power fields (typical field area 0.15–0.19 mm^2^, higher counts are associated with shorter survival).
  b. Mean diameter of the ten largest nucleoli.
    - Mean of the longest nucleoli (MLN) is measured along a central 5-mm long strip, e.g., after silver staining (larger values are associated with shorter survival).
  c. Presence of extravascular matrix patterns.
    - Loops.
      - Absent.
      - Present (shorter survival).
    - Loops forming networks.
      - Absent.
      - Present (shorter survival).
    - Other complex patterns (arcs with branching, parallel with cross-linking; absent or present).
      The patterns are assessed with light microscopy under a dark green filter after staining with periodic-acid Schiff without counterstain.
  d. Microvascular density.
    - Number of immunopositive elements labeled with markers for vascular endothelial cells (e.g., CD34 epitope, factor VIII-related antigen) in areas of densest vascularization (typical field area 0.31 mm^2^, higher counts are associated with shorter survival).
  e. Insulin-like growth factor 1 receptor (IGF1-R).
    - Percentage of immunopositive tumor cells (high expression is associated with shorter survival).
  f. Tumor-infiltrating lymphocytes.
    - Few (longest survival).
    - Moderate numbers.
    - Many (shortest survival).
  g. Tumor-infiltrating macrophages.
    - Few (longest survival).
    - Moderate numbers.
    - Many (shortest survival).
      The number can be compared with standard photographs.[12]
  h. HLA class I expression.
    - Percentage of immunopositive tumor cells (low expression is associated with longer survival).

### References

Factors predictive of growth and treatment of small choroidal melanoma: COMS Report No. 5. The Collaborative Ocular Melanoma Study Group. Arch Ophthalmol 115 (12): 1537-44, 1997.9400787 98061959
Diener-West M, Earle JD, Fine SL, et al.: The COMS randomized trial of iodine 125 brachytherapy for choroidal melanoma, II: characteristics of patients enrolled and not enrolled. COMS Report No. 17. Arch Ophthalmol 119 (7): 951-65, 2001.11448318 21341500
Shields CL, Shields JA, De Potter P, et al.: Diffuse choroidal melanoma. Clinical features predictive of metastasis. Arch Ophthalmol 114 (8): 956-63, 1996.8694731 96326194
Scott IU, Murray TG, Hughes JR: Evaluation of imaging techniques for detection of extraocular extension of choroidal melanoma. Arch Ophthalmol 116 (7): 897-9, 1998.9682702 98347624
Romero JM, Finger PT, Iezzi R, et al.: Three-dimensional ultrasonography of choroidal melanoma: extrascleral extension. Am J Ophthalmol 126 (6): 842-4, 1998.9860017 99075360
Echography (ultrasound) procedures for the Collaborative Ocular Melanoma Study (COMS), Report no. 12, Part I. J Ophthalmic Nurs Technol 18 (4): 143-9, 1999 Jul-Aug.10847038 20306401
Uveal melanoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 805–17.
Dithmar S, Diaz CE, Grossniklaus HE: Intraocular melanoma spread to regional lymph nodes: report of two cases. Retina 20 (1): 76-9, 2000.10696752 20159825
Diener-West M, Reynolds SM, Agugliaro DJ, et al.: Development of metastatic disease after enrollment in the COMS trials for treatment of choroidal melanoma: Collaborative Ocular Melanoma Study Group Report No. 26. Arch Ophthalmol 123 (12): 1639-43, 2005.16344433
Shields CL, Santos MC, Shields JA, et al.: Extraocular extension of unrecognized choroidal melanoma simulating a primary optic nerve tumor: report of two cases. Ophthalmology 106 (7): 1349-52, 1999.10406620 99333278
Singh AD, Shields JA, Shields CL, et al.: Choroidal melanoma metastatic to the contralateral choroid. Am J Ophthalmol 132 (6): 941-3, 2001.11730671 21587370
Mäkitie T, Summanen P, Tarkkanen A, et al.: Tumor-infiltrating macrophages (CD68(+) cells) and prognosis in malignant uveal melanoma. Invest Ophthalmol Vis Sci 42 (7): 1414-21, 2001.11381040

## Treatment Option Overview for Intraocular (Uveal) Melanoma

### Observation

Patients with iris melanomas have relatively good outcomes, with 5-year survival rates exceeding 95%. Iris melanomas are predominantly of the spindle-cell type and are usually smaller in size than posterior melanomas because they are detected earlier. Conservative management is generally advocated whenever possible, but surgical intervention may be justified with unequivocal tumor growth or with extensive disease at initial examination.

The management of small choroidal melanomas is controversial, and it is not clear whether treating small tumors prevents metastasis.[1] The natural history of small choroidal melanomas is poorly understood. Small, pigmented, choroidal lesions cannot always be differentiated reliably on examination. Growth is a presumed indicator of malignant potential.[2] The likelihood of progression from the time of diagnosis to the time when tumor growth warrants treatment has not been well characterized. Some ophthalmologists advocate observation. This course has been justified on several grounds, including the difficulty of establishing a correct diagnosis, the lack of any documented efficacy for globe-conserving treatments, and concerns for severe treatment-related morbidity. Others have advocated earlier therapeutic intervention.[1,3,4]

Although patients diagnosed with small choroidal tumors were not eligible for participation in the Collaborative Ocular Melanoma Study (COMS), these patients could participate in a prospective follow-up study to evaluate the natural history of small lesions. The 2-year tumor growth estimates were 21%, and the 5-year tumor growth estimates were 31%.[5] Clinical risk factors associated with tumor growth included:[3,5]

- Increased tumor thickness.
- Presence of subretinal fluid.
- Orange pigmentation.
- Absence of drusen.
- Absence of retinal pigment.
- Margin at the optic disc.
- Epithelial changes surrounding the tumor.

### Surgery

The selection of treatment depends on the following:

- Site of origin (choroid, ciliary body, or iris).
- Size and location of the lesion.
- Age of the patient.
- Occurrence of extraocular invasion, recurrence, or metastasis.

#### Enucleation

In the past, enucleation (eye removal) was the standard treatment for primary choroidal melanoma, and it is still used when large tumors are present. However, enucleation has been largely replaced by radiation therapy (i.e., brachytherapy with radioactive plaques or external-beam, charged-particle radiation therapy) to spare the affected eye.[6,7]

#### Pre-enucleation external-beam radiation therapy (EBRT)

A randomized trial evaluated the role of pre-enucleation EBRT for large choroidal tumors that required enucleation. The study found that EBRT had no impact on overall survival (OS).[8,9][Level of evidence A1] A COMS trial included 1,003 patients with large choroidal melanomas (≥2 mm in height and ≥16 mm in diameter, or ≥10 mm in height irrespective of diameter, or ≥8 mm in height and border <2 mm from the optic disc) with no known metastases. Patients were randomly assigned to receive enucleation alone or enucleation after preoperative external photon-beam radiation from cobalt 60 or accelerators (20 Gy in 5 daily fractions) to the orbit and globe.[8,9] Through 10 years of follow-up, the median survival in both arms was approximately 7 years, and the 10-year all-cause mortality rate was 61% in both arms (relative risk [RR]_death_, 1.00; 95% confidence interval [CI], 0.85–1.18). Metastasis-free survival was also nearly identical in both arms.

#### Transscleral local resection

Eye-sparing transscleral local resection plays a limited role in the management of uveal melanoma. It is used in patients with large choroidal and ciliary body tumors who are not candidates for radiation therapy but are highly motivated to retain their eye.[10- 12] The procedure is technically demanding and is generally performed only in centers with specialized expertise in this surgery. There is a substantial risk of retinal detachment, intraocular bleeding, and complications associated with the anesthesia-induced hypotension used to decrease the risk of bleeding. Either adjuvant brachytherapy or neoadjuvant proton-beam therapy are administered. Experience is limited to retrospective, single-center, case series.[10- 12][Level of evidence C3]

#### Surgical resection of metastases

Surgical resection of metastases from ocular melanoma has been reported in case series of highly selected patients with occasional favorable outcomes.[13,14] However, the favorable outcomes may be the result of strong patient-selection factors, and the role of resection in this setting is unclear.[13,14][Level of evidence C3]

### Radiation Therapy

Episcleral brachytherapy using plaques containing small radioactive seeds is the most common form of radiation used in the management of intraocular melanoma. Iodine I 125 (125I), cobalt Co 60 (60Co), palladium Pd 103 (103Pd), iridium Ir 192 (192Ir), and ruthenium Ru 106 (106Ru) are examples of radioactive isotopes used in the brachytherapy plaques. Isotopes with relatively low photon and electron emissions (125I, 103Pd, and 106Ru) are more easily shielded to reduce the exposure to adjacent normal tissues, and 125I is probably the most commonly used radioisotope.[15] Although plaque radiation therapy allows preservation of the eye, visual acuity is frequently lost over time.

In a case series of 1,106 patients who were treated with plaque radiation therapy for uveal melanoma and who had an initial acuity of at least 20/100, 68% developed poor acuity (i.e., 20/200 or worse) within 10 years.[16]

Factors associated with worse acuity outcomes included:[16]

- Age older than 60 years.
- Diminished baseline acuity.
- Diabetes.
- Increased tumor size and thickness.
- Location near the fovea or optic disc.
- Type of isotope therapy (106Ru, 60Co, or 192Ir vs. 125I).

125I brachytherapy yields equivalent overall and melanoma metastasis-specific survival rates to enucleation for medium-sized melanomas.[17][Level of evidence A1] The randomized COMS Medium Tumor Trial compared 125I episcleral-plaque brachytherapy (85 Gy at 0.42–1.06 Gy/hr) with enucleation in 1,317 patients with medium-sized choroidal tumors (tumor height 2.5–10.0 mm and tumor diameter ≤16.0 mm that were not contiguous with the optic disc).[17] Eighty-five percent of the patients treated with 125I brachytherapy retained their eye for 5 years or more, and 37% of them had visual acuity better than 20/200 in the irradiated eye 5 years after treatment.[17] No statistically significant differences in mortality were observed between the two study arms after 12 years of follow-up, either for death from all causes or death with histopathologically confirmed melanoma metastasis.[18] The 5- and 10-year all-cause mortality rates were 19% and 35% in both study arms. The cumulative all-cause mortality rate at 12 years was 43% in the 125I arm versus 41% in the enucleation arm (RR, 1.04; 95% CI, 0.86–1.24). The 5-year metastasis-specific mortality rates were 13% in both arms; at 10 years, the rates were 21% and 22% (RR for metastasis-specific mortality, 1.07; 95% CI, 0.81–1.41 through 12 years).

In a companion study within the COMS, 209 patients were prospectively assessed for quality of life during the first 5 years of follow-up.[19] Both study groups reported increasing difficulty with vision-oriented daily activities and ocular pain as time elapsed. Most measures of visual function were similar between the two groups. However, there were statistically significant differences favoring the brachytherapy group in comfort with driving for the first year after therapy and in reported peripheral vision for the first 2 years after therapy. These differences disappeared by year 5 of follow-up.[19][Level of evidence A3]

Charged-particle EBRT (using protons, carbon ions, or helium ions) is the other major form of radiation therapy used in the management of ocular melanomas.[20-23] This form of radiation therapy requires sophisticated equipment available only at selected centers. In addition, charged-particle EBRT involves patient cooperation during treatment (e.g., voluntarily fixating the eye on a particular point so the tumor is positioned properly in the radiation beam). A lower risk of early and late local radiation failures has been reported after charged-particle EBRT than after the use of brachytherapy, possibly resulting from differences in dose distribution in the two techniques.[20][Levels of evidence B3 and C3]

In a single-center, single-surgeon study, 184 patients with uveal melanomas smaller than 15 mm in diameter and smaller than 10 mm in thickness were randomly assigned to receive 125I brachytherapy versus helium ion radiation (to an estimated dose of 70 Gy equivalents in 5 fractions over 7 to 11 days in each arm).[24] The local tumor regrowth rate by 4 years was 13.3% in the brachytherapy arm compared with 0% in the helium ion arm (P < .001). However, the rates of metastasis, death from metastasis, and overall mortality were similar in both arms.[24][Level of evidence B3]

Because of its dose distribution, charged-particle irradiation can be better used than plaque brachytherapy to treat larger tumors and tumors closer to the fovea or optic disc. A large, single-center, single-surgeon series of 2,069 patients treated with proton-beam therapy had an actuarial local control rate of 95% (95% CI, 93%–96%) at 15 years. The cumulative rate of enucleation was 16% (95% CI, 13%–20%). Enucleations were primarily the result of neovascular glaucoma (46% of enucleations), blind uncomfortable eyes (31% of enucleations), or local recurrence (23% of enucleations). As with plaque radiation, risk factors for deterioration in visual acuity after charged-particle radiation were tumor size, location near the fovea or optic disc, baseline acuity, and underlying diabetes.[21]

Similarly, another large, single-center, single-surgeon, consecutive series of 886 patients treated with proton-beam irradiation reported a local control rate of 92.1% (95% CI, 89.8%–94.6%) and ocular conservation rate of 87.3% (95% CI, 83.9%–90.9%) at 10 years.[22][Level of evidence C3] The actuarial OS rate at 10 years was 64.1% (95% CI, 59.5%–69.0%).

In a single-center, phase I/II study of 57 evaluable patients treated with carbon ion-beam irradiation and followed for a median of 26 months, 26 patients developed neovascular glaucoma or severe eye pain from increased intraocular pressure, and 3 patients underwent enucleation. One patient had a local tumor recurrence.[23]

In an attempt to lower the complication rate and improve functional outcomes, one study compared a decreased dose of 50 cobalt Gy equivalents (CGE) with 70 CGE proton beam (each delivered in 5 fractions, usually within a 7-day period). Patients (n = 188) with tumors smaller than 15 mm in diameter and smaller than 5 mm in height, which were located near the optic disc or macula, were randomly assigned to the two doses in a double-masked study design. At 5 years, there were no statistically significant differences in local tumor control, rate of metastasis, visual acuity, or complication rates. However, the visual fields were better in the 50-CGE group.[25][Level of evidence B3]

As noted in the Surgery section, the role of pre-enucleation external photon-beam radiation therapy has been tested in a randomized trial and has shown no impact on OS for large choroidal tumors treated with enucleation.[8,9]

External-beam–photon-beam (gamma-ray) radiation therapy with gamma-knife stereotactic radiation surgery as a single-fraction [26] or fractionated stereotactic radiation [27,28] is being investigated as an alternative to brachytherapy or charged-beam radiation for posterior uveal melanomas, particularly for tumors too large or too close to the optic disc or macula to treat with brachytherapy. Because the dose rate of radiation has a slower delivery time than is the case with charged particles, specialized techniques are used to immobilize the eye [26] or to avoid delivery of the photons while the eye is moving or closed.[28] Experience is more limited with external-beam–photon therapy than for either brachytherapy or charged-particle EBRT, and there are no controlled comparisons with either of the other techniques. Early results from single-center series suggest similar levels of local tumor control and eye retention rates, but patient-selection factors may play a role.[28][Level of evidence C3]

### Transpupillary Thermotherapy

Transpupillary thermotherapy (TTT) directs an infrared laser, usually at a wavelength of 810 nm, through a dilated pupil in one or more sessions to induce heat necrosis of uveal melanomas. This method carries the theoretical advantage of high-precision destruction of tumor tissue under direct visualization. However, TTT has important limitations that confine its use to specific circumstances.[1,29] The limited ability of TTT to penetrate thick tumors with sufficient energy restricts its use to small melanomas or tumors of a size that some ophthalmologists recommend for follow-up without any initial therapy. For more information, see the Observation section. When used as the primary therapy, there are relatively high rates of local recurrence and retinal vascular damage. Recurrence rates are particularly high when the tumor abuts the optic nerve and overhangs the optic disc.[1][Level of evidence C3]

In a single-center study, 95 patients with small choroidal melanomas (diameter <10 mm and thickness <3.5 mm) were randomly assigned to receive either TTT or 125I brachytherapy (100 Gy).[30] The tumor regression rate was 92% in the TTT arm and 98% in the 125I arm (P = .4). With a mean follow-up time of 56.2 months, there were four recurrences in the TTT arm and one in the 125I arm. However, the study was too small to provide clear information on efficacy differences.

TTT is also under evaluation as an adjunct to primary therapy with proton-beam radiation. In large uveal melanomas, proton-beam therapy is associated with exudative, inflammatory, and glaucomatous complications that may require enucleation. In a single-center trial, 151 patients with uveal melanomas at least 7 mm thick or at least 15 mm in diameter were randomly assigned to receive proton-beam radiation (60 CGEs over four daily fractions) with or without TTT (810 nm wavelength at 1, 6, and 12 months after therapy) and followed for a median of 38 months.[31] There were no differences between the two groups in maculopathy, papillopathy, or glaucoma. The enucleation rate was lower in the TTT group (about 2% vs. 18% at 5 years, P = .02). However, the study was not masked, and replication of the results would be important.

There are uncertainties at all stages about the optimal management of intraocular melanoma. Physicians should discuss clinical trial opportunities with eligible patients. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### References

Shields CL, Shields JA, Perez N, et al.: Primary transpupillary thermotherapy for small choroidal melanoma in 256 consecutive cases: outcomes and limitations. Ophthalmology 109 (2): 225-34, 2002.11825800 21683965
Augsburger JJ: Is observation really appropriate for small choroidal melanomas. Trans Am Ophthalmol Soc 91: 147-68; discussion 169-75, 1993.8140689 94189010
Shields CL, Cater J, Shields JA, et al.: Combination of clinical factors predictive of growth of small choroidal melanocytic tumors. Arch Ophthalmol 118 (3): 360-4, 2000.10721958 20185033
Robertson DM, Buettner H, Bennett SR: Transpupillary thermotherapy as primary treatment for small choroidal melanomas. Arch Ophthalmol 117 (11): 1512-9, 1999.10565520 20029250
Factors predictive of growth and treatment of small choroidal melanoma: COMS Report No. 5. The Collaborative Ocular Melanoma Study Group. Arch Ophthalmol 115 (12): 1537-44, 1997.9400787 98061959
Zimmerman LE, McLean IW, Foster WD: Statistical analysis of follow-up data concerning uveal melanomas, and the influence of enucleation. Ophthalmology 87 (6): 557-64, 1980.7413145 81012770
De Potter P, Shields CL, Shields JA: New treatment modalities for uveal melanoma. Curr Opin Ophthalmol 7 (3): 27-32, 1996.10163456 97062228
The Collaborative Ocular Melanoma Study (COMS) randomized trial of pre-enucleation radiation of large choroidal melanoma II: initial mortality findings. COMS report no. 10. Am J Ophthalmol 125 (6): 779-96, 1998.9645716 98307648
Hawkins BS; Collaborative Ocular Melanoma Study Group: The Collaborative Ocular Melanoma Study (COMS) randomized trial of pre-enucleation radiation of large choroidal melanoma: IV. Ten-year mortality findings and prognostic factors. COMS report number 24. Am J Ophthalmol 138 (6): 936-51, 2004.15629284
Damato B: The role of eyewall resection in uveal melanoma management. Int Ophthalmol Clin 46 (1): 81-93, 2006.16365557
Bechrakis NE, Bornfeld N, Zöller I, et al.: Iodine 125 plaque brachytherapy versus transscleral tumor resection in the treatment of large uveal melanomas. Ophthalmology 109 (10): 1855-61, 2002.12359606
Bechrakis NE, Petousis V, Willerding G, et al.: Ten-year results of transscleral resection of large uveal melanomas: local tumour control and metastatic rate. Br J Ophthalmol 94 (4): 460-6, 2010.19965818
Hsueh EC, Essner R, Foshag LJ, et al.: Prolonged survival after complete resection of metastases from intraocular melanoma. Cancer 100 (1): 122-9, 2004.14692032
Pawlik TM, Zorzi D, Abdalla EK, et al.: Hepatic resection for metastatic melanoma: distinct patterns of recurrence and prognosis for ocular versus cutaneous disease. Ann Surg Oncol 13 (5): 712-20, 2006.16538410
Albert DM, Kulkarni AD: Intraocular melanoma. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 2090-8.
Shields CL, Shields JA, Cater J, et al.: Plaque radiotherapy for uveal melanoma: long-term visual outcome in 1106 consecutive patients. Arch Ophthalmol 118 (9): 1219-28, 2000.10980767
Diener-West M, Earle JD, Fine SL, et al.: The COMS randomized trial of iodine 125 brachytherapy for choroidal melanoma, III: initial mortality findings. COMS Report No. 18. Arch Ophthalmol 119 (7): 969-82, 2001.11448319 21341501
Collaborative Ocular Melanoma Study Group: The COMS randomized trial of iodine 125 brachytherapy for choroidal melanoma: V. Twelve-year mortality rates and prognostic factors: COMS report No. 28. Arch Ophthalmol 124 (12): 1684-93, 2006.17159027
Melia M, Moy CS, Reynolds SM, et al.: Quality of life after iodine 125 brachytherapy vs enucleation for choroidal melanoma: 5-year results from the Collaborative Ocular Melanoma Study: COMS QOLS Report No. 3. Arch Ophthalmol 124 (2): 226-38, 2006.16476893
Char DH, Kroll S, Phillips TL, et al.: Late radiation failures after iodine 125 brachytherapy for uveal melanoma compared with charged-particle (proton or helium ion) therapy. Ophthalmology 109 (10): 1850-4, 2002.12359605
Gragoudas E, Li W, Goitein M, et al.: Evidence-based estimates of outcome in patients irradiated for intraocular melanoma. Arch Ophthalmol 120 (12): 1665-71, 2002.12470140
Caujolle JP, Mammar H, Chamorey E, et al.: Proton beam radiotherapy for uveal melanomas at nice teaching hospital: 16 years' experience. Int J Radiat Oncol Biol Phys 78 (1): 98-103, 2010.19910136
Tsuji H, Ishikawa H, Yanagi T, et al.: Carbon-ion radiotherapy for locally advanced or unfavorably located choroidal melanoma: a Phase I/II dose-escalation study. Int J Radiat Oncol Biol Phys 67 (3): 857-62, 2007.17161555
Char DH, Quivey JM, Castro JR, et al.: Helium ions versus iodine 125 brachytherapy in the management of uveal melanoma. A prospective, randomized, dynamically balanced trial. Ophthalmology 100 (10): 1547-54, 1993.8414414 94020719
Gragoudas ES, Lane AM, Regan S, et al.: A randomized controlled trial of varying radiation doses in the treatment of choroidal melanoma. Arch Ophthalmol 118 (6): 773-8, 2000.10865313
Modorati G, Miserocchi E, Galli L, et al.: Gamma knife radiosurgery for uveal melanoma: 12 years of experience. Br J Ophthalmol 93 (1): 40-4, 2009.18757470
Muller K, Nowak PJ, de Pan C, et al.: Effectiveness of fractionated stereotactic radiotherapy for uveal melanoma. Int J Radiat Oncol Biol Phys 63 (1): 116-22, 2005.16111579
Dieckmann K, Georg D, Bogner J, et al.: Optimizing LINAC-based stereotactic radiotherapy of uveal melanomas: 7 years' clinical experience. Int J Radiat Oncol Biol Phys 66 (4 Suppl 1): 47-52, 2006.
Harbour JW, Meredith TA, Thompson PA, et al.: Transpupillary thermotherapy versus plaque radiotherapy for suspected choroidal melanomas. Ophthalmology 110 (11): 2207-14; discussion 2215, 2003.14597531
Pilotto E, Vujosevic S, De Belvis V, et al.: Long-term choroidal vascular changes after iodine brachytherapy versus transpupillary thermotherapy for choroidal melanoma. Eur J Ophthalmol 19 (4): 646-53, 2009 Jul-Aug.19551682
Desjardins L, Lumbroso-Le Rouic L, Levy-Gabriel C, et al.: Combined proton beam radiotherapy and transpupillary thermotherapy for large uveal melanomas: a randomized study of 151 patients. Ophthalmic Res 38 (5): 255-60, 2006.16888407

## Treatment of Iris Melanoma

Melanocytic stromal proliferations and nevi of the iris are the most common tumors of the iris, but melanoma is rare.[1,2] Clinical differentiation between an iris nevus and a melanoma might sometimes be difficult and, at times, impossible. Melanomas of the iris are usually small discrete lesions, although they may occasionally be diffuse, infiltrative, or multiple and may result in heterochromia, chronic uveitis, or spontaneous hemorrhage into the anterior chamber of the eye (hyphema). Iris melanomas that involve more than 66% of the angle circumference are associated with secondary glaucoma.[3]

Routine evaluation of iris melanomas includes gonioscopy, transillumination of the globe, and indirect ophthalmoscopy with 360° of scleral depression. Photographic documentation is essential to verify progression in size or growth of the tumor.[4] Anterior segment fluorescein angiography may be helpful to demonstrate the vascularity of the lesion but is not diagnostic. High-resolution ultrasound biomicroscopy can be used to measure small lesions (basal dimensions and thickness) and to assess tumor involvement of the anterior ciliary body, angle, and overlying sclera.[5] The main disadvantage with this technology is its limited penetration of large lesions. In these cases, conventional ultrasonography is more accurate.

In general, patients with iris melanomas have relatively good outcomes. Only about 3% of these melanomas metastasize within 5 years.[1] Iris melanomas are predominantly of the spindle-cell type and are usually smaller in size than posterior melanomas. Clinical features, including prominent tumor vascularity, rapid growth, and heterogeneous pigmentation, are associated with an epithelioid cell component.[6] Involvement of the iridocorneal angles is frequently associated with ciliary body invasion.[6]

Because iris melanomas are rare and have a good prognosis, clinical trials with sufficient power are impractical. Therefore, treatment experience is based principally on case series and case reports. Conservative management is generally advocated whenever possible, but surgical intervention may be justified with unequivocal tumor growth or extensive disease at initial examination.

### Treatment Options for Iris Melanoma

Treatment options for iris melanoma include:

1. Observation with careful follow-up. This option is used in asymptomatic patients with stable lesions; follow-up includes serial photography.[3]
2. Local resection. This option is used when progressive and pronounced growth is documented.[2]
3. Enucleation. This option is used if the tumor is not amenable to local resection because of diffuse involvement of the iris, involvement of more than 50% of the iris and anterior chamber angle, intractable glaucoma, or extraocular extension.[7]
4. Plaque radiation therapy. This option is offered as an alternative for large, diffuse, surgically nonresectable lesions of the iris.[8]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Albert DM, Kulkarni AD: Intraocular melanoma. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 2090-8.
Starr OD, Patel DV, Allen JP, et al.: Iris melanoma: pathology, prognosis and surgical intervention. Clin Experiment Ophthalmol 32 (3): 294-6, 2004.15180843
Marcus DM, Sahel JA, Jakobiec FA, et al.: Pigmented tumors of the iris. In: Albert DM, Jakobiec FA, eds.: Principles and Practice of Ophthalmology. WB Saunders Co., 1994, pp 3198-3208.
Yap-Veloso MI, Simmons RB, Simmons RJ: Iris melanomas: diagnosis and management. Int Ophthalmol Clin 37 (4): 87-100, 1997 Fall.9429934 98091769
Pavlin CJ, McWhae JA, McGowan HD, et al.: Ultrasound biomicroscopy of anterior segment tumors. Ophthalmology 99 (8): 1220-8, 1992.1513574 92382898
Conway RM, Chua WC, Qureshi C, et al.: Primary iris melanoma: diagnostic features and outcome of conservative surgical treatment. Br J Ophthalmol 85 (7): 848-54, 2001.11423461 21315256
Melanocytic tumors of the iris stroma. In: Shields JA: Diagnosis and Management of Intraocular Tumors. C.V. Mosby Company, 1983, pp 83-121.
Shields CL, Shields JA, De Potter P, et al.: Treatment of non-resectable malignant iris tumours with custom designed plaque radiotherapy. Br J Ophthalmol 79 (4): 306-12, 1995.7742272 95260767

## Treatment of Ciliary Body Melanoma

Melanoma involving the ciliary body is rare and patients have a poor prognosis. In some cases, diagnosis may be difficult because of similarity to other eye diseases. The differential diagnosis of ciliary body melanoma is considered in cases of unilateral pigmentary glaucoma and chronic uveitis.[1]

Ultrasound biomicroscopy can be used to evaluate tumor shape, thickness, margins, reflectivity, and local invasion.[2,3] Patients with tumors greater than 7 mm in thickness are at increased risk of metastatic disease and melanoma-related death compared with patients with thinner tumors.[4]

### Treatment Options for Ciliary Body Melanoma

There are several options for management of ciliary body melanoma. All of them are reported from case series.[Level of evidence C3] The choice of therapy, however, depends on many factors.

Treatment options for ciliary body melanoma include:

1. Plaque radiation therapy. Local control rates are high, but treatment is associated with a high incidence of secondary cataract.[4,5]
2. External-beam, charged-particle radiation therapy. This approach is offered at specialized referral centers. It requires careful patient cooperation, with voluntary fixation of gaze.[6-8]
3. Local tumor resection. This option is mainly suitable for selected ciliary body or anterior choroidal tumors with smaller basal dimension and greater thickness.[9,10]
4. Enucleation. This option is generally reserved for large melanomas when regaining useful vision is unlikely. It is also indicated in the presence of intractable secondary glaucoma and extraocular extension.[5,8]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Nguyen QD, Foster CS: Ciliary body melanoma masquerading as chronic uveitis. Ocul Immunol Inflamm 6 (4): 253-6, 1998.9924921 99122309
Marigo FA, Finger PT, McCormick SA, et al.: Iris and ciliary body melanomas: ultrasound biomicroscopy with histopathologic correlation. Arch Ophthalmol 118 (11): 1515-21, 2000.11074808 20529122
Daftari I, Barash D, Lin S, et al.: Use of high-frequency ultrasound imaging to improve delineation of anterior uveal melanoma for proton irradiation. Phys Med Biol 46 (2): 579-90, 2001.11229735 21121405
Gündüz K, Shields CL, Shields JA, et al.: Plaque radiotherapy of uveal melanoma with predominant ciliary body involvement. Arch Ophthalmol 117 (2): 170-7, 1999.10037560 99155164
Finger PT: Plaque radiation therapy for malignant melanoma of the iris and ciliary body. Am J Ophthalmol 132 (3): 328-35, 2001.11530044 21420944
Munzenrider JE: Uveal melanomas. Conservation treatment. Hematol Oncol Clin North Am 15 (2): 389-402, 2001.11370500 21263744
Char DH, Kroll SM, Castro J: Ten-year follow-up of helium ion therapy for uveal melanoma. Am J Ophthalmol 125 (1): 81-9, 1998.9437317 98099963
De Potter P: [Choroidal melanoma: current therapeutic approaches] J Fr Ophtalmol 25 (2): 203-11, 2002.11941244 21938348
De Potter P, Shields CL, Shields JA: New treatment modalities for uveal melanoma. Curr Opin Ophthalmol 7 (3): 27-32, 1996.10163456 97062228
Char DH, Miller T, Crawford JB: Uveal tumour resection. Br J Ophthalmol 85 (10): 1213-9, 2001.11567967 21452831

## Treatment of Small Choroidal Melanoma

A wide range of 5-year mortality rates has been reported for patients with small choroidal melanomas, with an average rate of about 16%.[1,2] Several studies indicate that the two most important clinical factors predictive of mortality are larger tumor size at the time of treatment and documentation of tumor growth.[3]

The management of small choroidal melanomas is controversial. The likelihood of progression from the time of diagnosis to growth warranting treatment has not been well characterized. Many ophthalmologists advocate initial observation. This initial management strategy is justified on several grounds, including difficulty in establishing a correct diagnosis, lack of documented efficacy for globe-conserving treatments, and concerns for severe treatment-related morbidity. Others have advocated earlier therapeutic intervention.[4-6]

### Treatment Options for Small Choroidal Melanoma

Treatment options for small choroidal melanoma include:

1. Observation. This strategy is important for patients with an uncertain diagnosis or whose tumor growth has not been documented. It is also used for asymptomatic patients with stable lesions (particularly older or debilitated patients) and for patients with a tumor in their only useful eye.[2]
2. Plaque radiation therapy. This treatment is used for small- or medium-sized uveal melanomas, amelanotic tumors, or tumors that touch the optic disc for greater than 3 clock-hours of optic disk circumference.[7,8]
3. External-beam, charged-particle radiation therapy. This approach is offered at specialized referral centers. It requires careful patient cooperation, with voluntary fixation of gaze.[7-10]
4. Gamma-knife radiation surgery. This treatment may be a feasible option for small- to medium-sized melanomas.[11-13]
5. Transpupillary thermotherapy. As noted above, this approach has very limited use, but it can be used as a primary treatment or as an adjunctive method to plaque radiation therapy.[5,6,14-18] For more information, see the Transpupillary Thermotherapy section.
6. Local tumor resection. This strategy is used mainly for selected ciliary body or anterior choroidal tumors with smaller basal dimensions and greater thickness.[19]
7. Enucleation. This approach is used when severe intraocular pressure elevation is a factor. It may also be considered with small- and medium-sized melanomas that are invading the tissues of the optic nerve.[20]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Diener-West M, Hawkins BS, Markowitz JA, et al.: A review of mortality from choroidal melanoma. II. A meta-analysis of 5-year mortality rates following enucleation, 1966 through 1988. Arch Ophthalmol 110 (2): 245-50, 1992.1531290 92143745
Mortality in patients with small choroidal melanoma. COMS report no. 4. The Collaborative Ocular Melanoma Study Group. Arch Ophthalmol 115 (7): 886-93, 1997.9230829 97374380
Shields CL, Shields JA, Kiratli H, et al.: Risk factors for growth and metastasis of small choroidal melanocytic lesions. Ophthalmology 102 (9): 1351-61, 1995.9097773 97252233
Shields CL, Cater J, Shields JA, et al.: Combination of clinical factors predictive of growth of small choroidal melanocytic tumors. Arch Ophthalmol 118 (3): 360-4, 2000.10721958 20185033
Shields CL, Shields JA, Perez N, et al.: Primary transpupillary thermotherapy for small choroidal melanoma in 256 consecutive cases: outcomes and limitations. Ophthalmology 109 (2): 225-34, 2002.11825800 21683965
Robertson DM, Buettner H, Bennett SR: Transpupillary thermotherapy as primary treatment for small choroidal melanomas. Arch Ophthalmol 117 (11): 1512-9, 1999.10565520 20029250
Shields CL, Shields JA, Gündüz K, et al.: Radiation therapy for uveal malignant melanoma. Ophthalmic Surg Lasers 29 (5): 397-409, 1998.9599365 98261731
Finger PT: Radiation therapy for choroidal melanoma. Surv Ophthalmol 42 (3): 215-32, 1997 Nov-Dec.9406368 98069442
Munzenrider JE: Uveal melanomas. Conservation treatment. Hematol Oncol Clin North Am 15 (2): 389-402, 2001.11370500 21263744
Char DH, Kroll SM, Castro J: Ten-year follow-up of helium ion therapy for uveal melanoma. Am J Ophthalmol 125 (1): 81-9, 1998.9437317 98099963
Woodburn R, Danis R, Timmerman R, et al.: Preliminary experience in the treatment of choroidal melanoma with gamma knife radiosurgery. J Neurosurg 93 (Suppl 3): 177-9, 2000.11143241 21004900
Modorati G, Miserocchi E, Galli L, et al.: Gamma knife radiosurgery for uveal melanoma: 12 years of experience. Br J Ophthalmol 93 (1): 40-4, 2009.18757470
Muller K, Nowak PJ, de Pan C, et al.: Effectiveness of fractionated stereotactic radiotherapy for uveal melanoma. Int J Radiat Oncol Biol Phys 63 (1): 116-22, 2005.16111579
Shields CL, Shields JA: Transpupillary thermotherapy for choroidal melanoma. Curr Opin Ophthalmol 10 (3): 197-203, 1999.10537779 99309725
Godfrey DG, Waldron RG, Capone A: Transpupillary thermotherapy for small choroidal melanoma. Am J Ophthalmol 128 (1): 88-93, 1999.10482099 99409825
Bartlema YM, Oosterhuis JA, Journée-De Korver JG, et al.: Combined plaque radiotherapy and transpupillary thermotherapy in choroidal melanoma: 5 years' experience. Br J Ophthalmol 87 (11): 1370-3, 2003.14609837
Harbour JW, Meredith TA, Thompson PA, et al.: Transpupillary thermotherapy versus plaque radiotherapy for suspected choroidal melanomas. Ophthalmology 110 (11): 2207-14; discussion 2215, 2003.14597531
Pilotto E, Vujosevic S, De Belvis V, et al.: Long-term choroidal vascular changes after iodine brachytherapy versus transpupillary thermotherapy for choroidal melanoma. Eur J Ophthalmol 19 (4): 646-53, 2009 Jul-Aug.19551682
Char DH, Miller T, Crawford JB: Uveal tumour resection. Br J Ophthalmol 85 (10): 1213-9, 2001.11567967 21452831
Shields JA, Shields CL: Atlas of Intraocular Tumors. Lippincott Williams & Wilkins, 1999.

## Treatment of Medium and Large Choroidal Melanoma

Eye-sparing radiation therapy, either by plaque brachytherapy or external beam, is the preferred option for most patients with medium-sized choroidal melanoma. Enucleation remains the standard therapy for large choroidal melanomas and melanomas that cause severe glaucoma or invade the optic nerve.

### Treatment Options for Medium and Large Choroidal Melanoma

Tumor growth pattern is a factor in the therapeutic decision. Enucleation is considered for a diffuse melanoma or extraocular extension, but radiation therapy can be employed for less extensive disease.

Treatment options for medium and large choroidal melanoma include:

Medium-sized choroidal melanomas
1. Plaque radiation therapy. [1 - 4]
2. External-beam, charged-particle radiation therapy. This approach is offered at specialized referral centers. It requires careful patient cooperation, with voluntary fixation of gaze.[5-7]
3. Local eye-wall resection.[8,9]
4. Combined therapy, with ablative laser coagulation or transpupillary thermotherapy to supplement plaque treatment.[10,11] For more information, see the Transpupillary Thermotherapy section.
5. Enucleation. This approach is considered primarily for diffuse melanomas or extraocular extension. Enucleation may be necessary when there are radiation complications or tumor recurrences.[10]

Large choroidal melanomas
1. Enucleation when the tumor is judged to be too large for eye-sparing approaches.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Karvat A, Duzenli C, Ma R, et al.: The treatment of choroidal melanoma with 198 Au plaque brachytherapy. Radiother Oncol 59 (2): 153-6, 2001.11325443 21225874
Tabandeh H, Chaudhry NA, Murray TG, et al.: Intraoperative echographic localization of iodine-125 episcleral plaque for brachytherapy of choroidal melanoma. Am J Ophthalmol 129 (2): 199-204, 2000.10682973 20145178
Diener-West M, Earle JD, Fine SL, et al.: The COMS randomized trial of iodine 125 brachytherapy for choroidal melanoma, III: initial mortality findings. COMS Report No. 18. Arch Ophthalmol 119 (7): 969-82, 2001.11448319 21341501
Melia BM, Abramson DH, Albert DM, et al.: Collaborative ocular melanoma study (COMS) randomized trial of I-125 brachytherapy for medium choroidal melanoma. I. Visual acuity after 3 years COMS report no. 16. Ophthalmology 108 (2): 348-66, 2001.11158813 21106934
Char DH, Quivey JM, Castro JR, et al.: Helium ions versus iodine 125 brachytherapy in the management of uveal melanoma. A prospective, randomized, dynamically balanced trial. Ophthalmology 100 (10): 1547-54, 1993.8414414 94020719
Fuss M, Loredo LN, Blacharski PA, et al.: Proton radiation therapy for medium and large choroidal melanoma: preservation of the eye and its functionality. Int J Radiat Oncol Biol Phys 49 (4): 1053-9, 2001.11240247 21135730
Char DH, Kroll SM, Castro J: Ten-year follow-up of helium ion therapy for uveal melanoma. Am J Ophthalmol 125 (1): 81-9, 1998.9437317 98099963
Char DH, Miller T, Crawford JB: Uveal tumour resection. Br J Ophthalmol 85 (10): 1213-9, 2001.11567967 21452831
Peyman GA, Juarez CP, Diamond JG, et al.: Ten years experience with eye wall resection for uveal malignant melanomas. Ophthalmology 91 (12): 1720-5, 1984.6522002 85112016
Seregard S, Landau I: Transpupillary thermotherapy as an adjunct to ruthenium plaque radiotherapy for choroidal melanoma. Acta Ophthalmol Scand 79 (1): 19-22, 2001.11167280 21070452
Shields JA: The expanding role of laser photocoagulation for intraocular tumors. The 1993 H. Christian Zweng Memorial Lecture. Retina 14 (4): 310-22, 1994.7817024 95116739

## Treatment of Extraocular Extension and Metastatic Intraocular Melanoma

Extrascleral extension is associated with a poor prognosis. For patients with gross tumor involvement of the orbit, treatment requires orbital exenteration. However, there is no evidence that such radical surgery will prolong survival. Most patients with localized or encapsulated extraocular extension are not exenterated. This subject is controversial.[1-5]

No effective method of systemic treatment has been identified for patients with metastatic ocular melanoma. Clinical trials are an option for these patients.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Shammas HF, Blodi FC: Prognostic factors in choroidal and ciliary body melanomas. Arch Ophthalmol 95 (1): 63-9, 1977.836204 77111487
Pach JM, Robertson DM, Taney BS, et al.: Prognostic factors in choroidal and ciliary body melanomas with extrascleral extension. Am J Ophthalmol 101 (3): 325-31, 1986.3953727 86156041
Kersten RC, Tse DT, Anderson RL, et al.: The role of orbital exenteration in choroidal melanoma with extrascleral extension. Ophthalmology 92 (3): 436-43, 1985.3991131 85189249
Hykin PG, McCartney AC, Plowman PN, et al.: Postenucleation orbital radiotherapy for the treatment of malignant melanoma of the choroid with extrascleral extension. Br J Ophthalmol 74 (1): 36-9, 1990.2106340 90167057
Gündüz K, Shields CL, Shields JA, et al.: Plaque radiotherapy for management of ciliary body and choroidal melanoma with extraocular extension. Am J Ophthalmol 130 (1): 97-102, 2000.11004266 20460619

## Treatment of Recurrent Intraocular Melanoma

The prognosis for any patient with recurring or relapsing disease is poor, regardless of cell type or stage. The question and selection of further treatment depends on many factors, including the extent of the lesion, age and health of the patient, prior treatment, site of recurrence, and individual patient considerations. Surgical resection of metastases diagnosed after initial management of ocular melanoma in single-center case series of highly selected patients has been reported. The extent to which the occasional favorable outcomes are the result of strong selection factors is not clear, so this approach cannot be considered standard.[1]

Eligible patients should consider participation in clinical trials whenever possible.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Hsueh EC, Essner R, Foshag LJ, et al.: Prolonged survival after complete resection of metastases from intraocular melanoma. Cancer 100 (1): 122-9, 2004.14692032

## Latest Updates to This Summary (12/19/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of intraocular melanoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Intraocular (Uveal) Melanoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/eye/hp/intraocular-melanoma-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389482]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).